# Oral Complications of Cancer Therapies (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the causes and treatment of oral complications of cancer therapies. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## General Information About Oral Complications

Key Points for This Section
- Oral complications are common in cancer patients, especially those with head and neck cancer.
- Preventing and controlling oral complications can help you continue cancer treatment and have a better quality of life.
- Patients receiving treatments that affect the head and neck should have their care planned by a team of doctors and specialists.

### Oral complications are common in cancer patients, especially those with head and neck cancer.

Complications are new medical problems that occur during or after a disease, procedure, or treatment and that make recovery harder. The complications may be side effects of the disease or treatment, or they may have other causes. Oral complications affect the mouth.

Cancer patients have a high risk of oral complications for a number of reasons:

- Chemotherapy and radiation therapy slow or stop the growth of new cells.
  These cancer treatments slow or stop the growth of fast growing cells, such as cancer cells. Normal cells in the lining of the mouth also grow quickly, so anticancer treatment can stop them from growing, too. This slows down the ability of oral tissue to repair itself by making new cells.
- Radiation therapy may directly damage and break down oral tissue, salivary glands, and bone.
- Chemotherapy and radiation therapy upset the healthy balance of bacteria in the mouth.
  There are many different kinds of bacteria in the mouth. Some are helpful and some are harmful. Chemotherapy and radiation therapy may cause changes in the lining of the mouth and the salivary glands, which make saliva. This can upset the healthy balance of bacteria. These changes may lead to mouth sores, infections, and tooth decay.

This summary is about oral complications caused by chemotherapy and radiation therapy.

### Preventing and controlling oral complications can help you continue cancer treatment and have a better quality of life.

Sometimes treatment doses need to be decreased or treatment stopped because of oral complications. Preventive care before cancer treatment begins and treating problems as soon as they appear may make oral complications less severe. When there are fewer complications, cancer treatment may work better and you may have a better quality of life.

### Patients receiving treatments that affect the head and neck should have their care planned by a team of doctors and specialists.

To manage oral complications, the oncologist will work closely with your dentist and may refer you to other health professionals with special training. These may include the following specialists:

- Oncology nurse.
- Dental specialists.
- Dietitian.
- Speech therapist.
- Social worker.

The goals of oral and dental care are different before, during, and after cancer treatment:

- Before cancer treatment, the goal is to prepare for cancer treatment by treating existing oral problems.
- During cancer treatment, the goals are to prevent oral complications and manage problems that occur.
- After cancer treatment, the goals are to keep teeth and gums healthy and manage any long-term side effects of cancer and its treatment.

The most common oral complications from cancer treatment include the following:

- Oral mucositis (inflamed mucous membranes in the mouth).
- Infection.
- Salivary gland problems.
- Change in taste.
- Pain.

These complications can lead to other problems such as dehydration and malnutrition.

## Oral Complications and Their Causes

Key Points for This Section
- Cancer treatment can cause mouth and throat problems.
  - Complications of chemotherapy
  - Complications of radiation therapy
  - Complications caused by either chemotherapy or radiation therapy
- Oral complications may be caused by the treatment itself (directly) or by side effects of the treatment (indirectly).
- Complications may be acute (short-term) or chronic (long-lasting).

### Cancer treatment can cause mouth and throat problems.

#### Complications of chemotherapy

Oral complications caused by chemotherapy include the following:

- Inflammation and ulcers of the mucous membranes in the stomach or intestines.
- Easy bleeding in the mouth.
- Nerve damage.

#### Complications of radiation therapy

Oral complications caused by radiation therapy to the head and neck include the following:

- Fibrosis (growth of fibrous tissue) in the mucous membrane in the mouth.
- Tooth decay and gum disease.
- Breakdown of tissue in the area that receives radiation.
- Breakdown of bone in the area that receives radiation.
- Fibrosis of muscle in the area that receives radiation.

#### Complications caused by either chemotherapy or radiation therapy

The most common oral complications may be caused by either chemotherapy or radiation therapy. These include the following:

- Inflamed mucous membranes in the mouth.
- Infections in the mouth or that travel through the bloodstream. These can reach and affect cells all over the body.
- Taste changes.
- Dry mouth.
- Pain.
- Changes in dental growth and development in children.
- Malnutrition (not getting enough of the nutrients the body needs to be healthy) caused by being unable to eat.
- Dehydration (not getting the amount of water the body needs to be healthy) caused by being unable to drink.
- Tooth decay and gum disease.

### Oral complications may be caused by the treatment itself (directly) or by side effects of the treatment (indirectly).

Radiation therapy can directly damage oral tissue, salivary glands, and bone. Areas treated may scar or waste away. Total-body radiation can cause permanent damage to the salivary glands. This can change the way foods taste and cause dry mouth.

Slow healing and infection are indirect complications of cancer treatment. Both chemotherapy and radiation therapy can stop cells from dividing and slow the healing process in the mouth. Chemotherapy may decrease the number of white blood cells and weaken the immune system (the organs and cells that fight infection and disease). This makes it easier to get an infection.

### Complications may be acute (short-term) or chronic (long-lasting).

Acute complications are ones that occur during treatment and then go away. Chemotherapy usually causes acute complications that heal after treatment ends.

Chronic complications are ones that continue or appear months to years after treatment ends. Radiation can cause acute complications but may also cause permanent tissue damage that puts you at a lifelong risk of oral complications. The following chronic complications may continue after radiation therapy to the head or neck has ended:

- Dry mouth.
- Tooth decay.
- Infections.
- Taste changes.
- Problems in the mouth and jaw caused by loss of tissue and bone.
- Problems in the mouth and jaw caused by the growth of benign tumors in the skin and muscle.

Oral surgery or other dental work can cause problems in patients who have had radiation therapy to the head or neck. Make sure that your dentist knows your health history and the cancer treatments you received.

## Preventing and Treating Oral Complications Before Chemotherapy or Radiation Therapy Begins

Key Points for This Section
- Finding and treating oral problems before cancer treatment begins can prevent oral complications or make them less severe.
- Prevention of oral complications includes a healthy diet, good oral care, and dental checkups.
- Patients receiving high-dose chemotherapy, stem cell transplant, or radiation therapy should have an oral care plan in place before treatment begins.
- It is important that patients who have head or neck cancer stop smoking.

### Finding and treating oral problems before cancer treatment begins can prevent oral complications or make them less severe.

Problems such as cavities, broken teeth, loose crowns or fillings, and gum disease can get worse or cause problems during cancer treatment. Bacteria live in the mouth and may cause an infection when the immune system is not working well or when white blood cell counts are low. If dental problems are treated before cancer treatments begin, there may be fewer or milder oral complications.

### Prevention of oral complications includes a healthy diet, good oral care, and dental checkups.

Ways to prevent oral complications include the following:

- Eat a well-balanced diet. Healthy eating can help the body stand the stress of cancer treatment, help keep up your energy, fight infection, and rebuild tissue.
- Keep your mouth and teeth clean. This helps prevent cavities, mouth sores, and infections.
- Have a complete oral health exam.
  Your dentist should be part of your cancer care team. It is important to choose a dentist who has experience treating patients with oral complications of cancer treatment. A checkup of your oral health at least a month before cancer treatment begins usually allows enough time for the mouth to heal if any dental work is needed. The dentist will treat teeth that have a risk of infection or decay. This will help avoid the need for dental treatments during cancer treatment. Preventive care may help lessen dry mouth, which is a common complication of radiation therapy to the head or neck.
  A preventive oral health exam will check for the following:
  - Mouth sores or infections.
  - Tooth decay.
  - Gum disease.
  - Dentures that do not fit well.
  - Problems moving the jaw.
  - Problems with the salivary glands.

### Patients receiving high-dose chemotherapy, stem cell transplant, or radiation therapy should have an oral care plan in place before treatment begins.

The goal of the oral care plan is to find and treat oral disease that may cause complications during treatment and to continue oral care during treatment and recovery. Different oral complications may occur during the different phases of a transplant. Steps can be taken ahead of time to prevent or lessen how severe these side effects will be.

Oral care during radiation therapy will depend on the following:

- Specific needs of the patient.
- The radiation dose.
- The part of the body treated.
- How long the radiation treatment lasts.
- Specific complications that occur.

### It is important that patients who have head or neck cancer stop smoking.

Continuing to smoke tobacco may slow down recovery. It can also increase the risk that the head or neck cancer will recur or that a second cancer will form.

## Managing Oral Complications During and After Chemotherapy or Radiation Therapy

Key Points for This Section
- Regular Oral Care
  - Good dental hygiene may help prevent or decrease complications.
  - Everyday oral care for cancer patients includes keeping the mouth clean and being gentle with the tissue lining the mouth.
- Oral Mucositis
  - Oral mucositis is an inflammation of mucous membranes in the mouth.
  - Care of mucositis during chemotherapy and radiation therapy includes cleaning the mouth and relieving pain.
- Pain
  - There can be many causes of oral pain in cancer patients.
  - Oral pain in cancer patients may be caused by the cancer.
  - Oral pain may be a side effect of treatments.
  - Certain anticancer drugs can cause oral pain.
  - Teeth grinding may cause pain in the teeth or jaw muscles.
  - Pain control helps improve the patient's quality of life.
- Infection
  - Damage to the lining of the mouth and a weakened immune system make it easier for infection to occur.
  - Infections may be caused by bacteria, a fungus, or a virus.
- Bleeding
  - Bleeding may occur when anticancer drugs make the blood less able to clot.
  - Most patients can safely brush and floss while blood counts are low.
- Dry Mouth
  - Dry mouth (xerostomia) occurs when the salivary glands don't make enough saliva.
  - Salivary glands usually return to normal after chemotherapy ends.
  - Salivary glands may not recover completely after radiation therapy ends.
  - Careful oral hygiene can help prevent mouth sores, gum disease, and tooth decay caused by dry mouth.
- Tooth Decay
- Taste Changes
- Fatigue
- Malnutrition
  - Loss of appetite can lead to malnutrition.
  - Nutrition support may include liquid diets and tube feeding.
- Mouth and Jaw Stiffness
- Swallowing Problems
  - Pain during swallowing and being unable to swallow (dysphagia) are common in cancer patients before, during, and after treatment.
  - Trouble swallowing increases the risk of other complications.
  - Whether radiation therapy will affect swallowing depends on several factors.
  - Swallowing problems sometimes go away after treatment
  - Swallowing problems are managed by a team of experts.
- Tissue and Bone Loss

### Regular Oral Care

#### Good dental hygiene may help prevent or decrease complications.

It is important to keep a close watch on oral health during cancer treatment. This helps prevent, find, and treat complications as soon as possible. Keeping the mouth, teeth, and gums clean during and after cancer treatment may help decrease complications such as cavities, mouth sores, and infections.

#### Everyday oral care for cancer patients includes keeping the mouth clean and being gentle with the tissue lining the mouth.

Everyday oral care during chemotherapy and radiation therapy includes the following:

Brushing teeth
- Brush teeth and gums with a soft-bristle brush 2 to 3 times a day for 2 to 3 minutes. Be sure to brush the area where the teeth meet the gums and to rinse often.
- Rinse the toothbrush in hot water every 15 to 30 seconds to soften the bristles, if needed.
- Use a foam brush only if a soft-bristle brush cannot be used. Brush 2 to 3 times a day and use an antibacterial rinse. Rinse often.
- Let the toothbrush air-dry between brushings.
- Use a fluoride toothpaste with a mild taste. Flavoring may irritate the mouth, especially mint flavoring.
- If toothpaste irritates your mouth, brush with a mixture of 1/4 teaspoon of salt added to 1 cup of water.

Rinsing
- Use a rinse every 2 hours to decrease soreness in the mouth. Dissolve 1/4 teaspoon of salt and 1/4 teaspoon of baking soda in 1 quart of water.
- An antibacterial rinse may be used 2 to 4 times a day for gum disease. Rinse for 1 to 2 minutes.
- If dry mouth occurs, rinsing may not be enough to clean the teeth after a meal. Brushing and flossing may be needed.

Flossing
- Floss gently once a day.

Lip care
- Use lip care products, such as cream with lanolin, to prevent drying and cracking.

Denture care
- Brush and rinse dentures every day. Use a soft-bristle toothbrush or one made for cleaning dentures.
- Clean with a denture cleaner recommended by your dentist.
- Keep dentures moist when not being worn. Place them in water or a denture soaking solution recommended by your dentist. Do not use hot water, which can cause the denture to lose its shape.

For special oral care during high-dose chemotherapy and stem cell transplant, see the Managing Oral Complications of High-Dose Chemotherapy and/or Stem Cell Transplant section of this summary.

### Oral Mucositis

#### Oral mucositis is an inflammation of mucous membranes in the mouth.

The terms "oral mucositis" and "stomatitis" are often used in place of each other, but they are different.

- Oral mucositis is an inflammation of mucous membranes in the mouth. It usually appears as red, burn-like sores or as ulcer-like sores in the mouth.
- Stomatitis is an inflammation of mucous membranes and other tissues in the mouth. These include the gums, tongue, roof and floor of the mouth, and the inside of the lips and cheeks.

Mucositis may be caused by either radiation therapy or chemotherapy.

- Mucositis caused by chemotherapy will heal by itself, usually in 2 to 4 weeks if there is no infection.
- Mucositis caused by radiation therapy usually lasts 6 to 8 weeks, depending on how long the treatment was.
- In patients receiving high-dose chemotherapy or chemoradiation for stem cell transplant: Mucositis usually begins 7 to 10 days after treatment begins, and lasts for about 2 weeks after treatment ends.

Swishing ice chips in the mouth for 30 minutes, beginning 5 minutes before patients receive fluorouracil, may help prevent mucositis. Patients who receive high-dose chemotherapy and stem cell transplant may be given medicine to help prevent mucositis or keep it from lasting as long.

Mucositis may cause the following problems:

- Pain.
- Infection.
- Bleeding, in patients receiving chemotherapy. Patients receiving radiation therapy usually do not have bleeding.
- Trouble breathing and eating.

#### Care of mucositis during chemotherapy and radiation therapy includes cleaning the mouth and relieving pain.

Treatment of mucositis caused by either radiation therapy or chemotherapy is about the same. Treatment depends on your white blood cell count and how severe the mucositis is. The following are ways to treat mucositis during chemotherapy, stem cell transplant, or radiation therapy:

Cleaning the mouth

- Clean your teeth and mouth every 4 hours and at bedtime. Do this more often if the mucositis becomes worse.
- Use a soft-bristle toothbrush.
- Replace your toothbrush often.
- Use lubricating jelly that is water-soluble, to help keep your mouth moist.
- Use mild rinses or plain water. Frequent rinsing removes pieces of food and bacteria from the mouth, prevents crusting of sores, and moistens and soothes sore gums and the lining of the mouth.
- If mouth sores begin to crust over, the following rinse may be used:
  - Three percent hydrogen peroxide mixed with an equal amount of water or saltwater. To make a saltwater mixture, put 1/4 teaspoon of salt in 1 cup of water.
  This should not be used for more than 2 days because it will keep mucositis from healing.

Relieving mucositis pain

- Try topical medicines for pain. Rinse your mouth before putting the medicine on the gums or lining of the mouth. Wipe mouth and teeth gently with wet gauze dipped in saltwater to remove pieces of food.
- Painkillers may help when topical medicines do not. Nonsteroidal anti-inflammatory drugs (NSAIDS, aspirin-type painkillers) should not be used by patients receiving chemotherapy because they increase the risk of bleeding.
- Zinc supplements taken during radiation therapy may help treat pain caused by mucositis as well as dermatitis (inflammation of the skin).
- Povidone-iodine mouthwash that does not contain alcohol may help delay or decrease mucositis caused by radiation therapy.

See the Pain section of this summary for more information on pain control.

### Pain

#### There can be many causes of oral pain in cancer patients.

A cancer patient's pain may come from the following:

- The cancer.
- Side effects of cancer treatments.
- Other medical conditions not related to the cancer.

Because there can be many causes of oral pain, a careful diagnosis is important. This may include:

- A medical history.
- Physical and dental exams.
- X-rays of the teeth.

#### Oral pain in cancer patients may be caused by the cancer.

Cancer can cause pain in different ways:

- The tumor presses on nearby areas as it grows and affects nerves and causes inflammation.
- Leukemias and lymphomas, which spread through the body and may affect sensitive areas in the mouth. Multiple myeloma can affect the teeth.
- Brain tumors may cause headaches.
- Cancer may spread to the head and neck from other parts of the body and cause oral pain.
- With some cancers, pain may be felt in parts of the body not near the cancer. This is called referred pain. Tumors of the nose, throat, and lungs can cause referred pain in the mouth or jaw.

#### Oral pain may be a side effect of treatments.

Oral mucositis is the most common side effect of radiation therapy and chemotherapy. Pain in the mucous membranes often continues for a while even after the mucositis is healed.

Surgery may damage bone, nerves, or tissue and may cause pain. Bisphosphonates, drugs taken to treat bone pain, sometimes cause bone to break down. This is most common after a dental procedure such as having a tooth pulled. (See the Oral Complications Not Related to Chemotherapy or Radiation Therapy section of this summary for more information.)

Patients who have transplants may develop graft-versus-host-disease (GVHD). This can cause inflammation of the mucous membranes and joint pain. (See the Managing Oral Complications of High-Dose Chemotherapy and/or Stem Cell Transplant section of this summary for more information).

#### Certain anticancer drugs can cause oral pain.

If an anticancer drug is causing pain, stopping the drug usually stops the pain. Because there may be many causes of oral pain during cancer treatment, a careful diagnosis is important. This may include a medical history, physical and dental exams, and x-rays of the teeth.

Some patients may have sensitive teeth weeks or months after chemotherapy has ended. Fluoride treatments or toothpaste for sensitive teeth may relieve the discomfort.

#### Teeth grinding may cause pain in the teeth or jaw muscles.

Pain in the teeth or jaw muscles may occur in patients who grind their teeth or clench their jaws, often because of stress or not being able to sleep. Treatment may include muscle relaxers, drugs to treat anxiety, physical therapy (moist heat, massage, and stretching), and mouth guards to wear while sleeping.

#### Pain control helps improve the patient's quality of life.

Oral and facial pain can affect eating, talking, and many other activities that involve the head, neck, mouth, and throat. Most patients with head and neck cancers have pain. The doctor may ask the patient to rate the pain using a rating system. This may be on a scale from 0 to 10, with 10 being the worst. The level of pain felt is affected by many different things. It's important for patients to talk with their doctors about pain.

Pain that is not controlled can affect all areas of the patient's life. Pain may cause feelings of anxiety and depression, and may prevent the patient from working or enjoying everyday life with friends and family. Pain may also slow the recovery from cancer or lead to new physical problems. Controlling cancer pain can help the patient enjoy normal routines and a better quality of life.

For oral mucositis pain, topical treatments are usually used. See the Oral Mucositis section of this summary for information on relieving oral mucositis pain.

Other pain medicines may be also be used. Sometimes, more than one pain medicine is needed. Muscle relaxers and medicines for anxiety or depression or to prevent seizures may help some patients. For severe pain, opioids may be prescribed.

Non-drug treatments may also help, including the following:

- Physical therapy.
- TENS (transcutaneous electrical nerve stimulation).
- Applying cold or heat.
- Hypnosis.
- Acupuncture. (See the PDQ summary on Acupuncture.)
- Distraction.
- Relaxation therapy or imagery.
- Cognitive behavioral therapy.
- Music or drama therapy.
- Counseling.

### Infection

#### Damage to the lining of the mouth and a weakened immune system make it easier for infection to occur.

Oral mucositis breaks down the lining of the mouth, which lets bacteria and viruses get into the blood. When the immune system is weakened by chemotherapy, even good bacteria in the mouth can cause infections. Germs picked up from the hospital or other places may also cause infections.

As the white blood cell count gets lower, infections may occur more often and become more serious. Patients who have low white blood cell counts for a long time have a higher risk of serious infections. Dry mouth, which is common during radiation therapy to the head and neck, may also raise the risk of infections in the mouth.

Dental care given before chemotherapy and radiation therapy are started can lower the risk of infections in the mouth, teeth, or gums.

#### Infections may be caused by bacteria, a fungus, or a virus.

Bacterial infections

Treatment of bacterial infections in patients who have gum disease and receive high-dose chemotherapy may include the following:

- Using medicated and peroxide mouth rinses.
- Brushing and flossing.
- Wearing dentures as little as possible.

Fungal infections

The mouth normally contains fungi that can live on or in the oral cavity without causing any problems. However, an overgrowth (too much fungi) in the mouth can be serious and should be treated.

Antibiotics and steroid drugs are often used when a patient receiving chemotherapy has a low white blood cell count. These drugs change the balance of bacteria in the mouth, making it easier for a fungal overgrowth to occur. Also, fungal infections are common in patients treated with radiation therapy. Patients receiving cancer treatment may be given drugs to help prevent fungal infections from occurring.

Candidiasis is a type of fungal infection that is common in patients receiving both chemotherapy and radiation therapy. Symptoms may include a burning pain and taste changes. Treatment of fungal infections in the lining of the mouth only may include mouthwashes and lozenges that contain antifungal drugs. An antifungal rinse should be used to soak dentures and dental devices and to rinse the mouth. Drugs may be used to when rinses and lozenges do not get rid of the fungal infection. Drugs are sometimes used to prevent fungal infections.

Viral infections

Patients receiving chemotherapy, especially those with immune systems weakened by stem cell transplant, have an increased risk of viral infections. Herpesvirus infections and other viruses that are latent (present in the body but not active or causing symptoms) may flare up. Finding and treating the infections early is important. Giving antiviral drugs before treatment starts can lower the risk of viral infections.

### Bleeding

#### Bleeding may occur when anticancer drugs make the blood less able to clot.

High-dose chemotherapy and stem cell transplants can cause a lower-than-normal number of platelets in the blood. This can cause problems with the body's blood clotting process. Bleeding may be mild (small red spots on the lips, soft palate, or bottom of the mouth) or severe, especially at the gum line and from ulcers in the mouth. Areas of gum disease may bleed on their own or when irritated by eating, brushing, or flossing. When platelet counts are very low, blood may ooze from the gums.

#### Most patients can safely brush and floss while blood counts are low.

Continuing regular oral care will help prevent infections that can make bleeding problems worse. Your dentist or medical doctor can explain how to treat bleeding and safely keep your mouth clean when platelet counts are low.

Treatment for bleeding during chemotherapy may include the following:

- Medicines to reduce blood flow and help clots form.
- Topical products that cover and seal bleeding areas.
- Rinsing with a mixture of saltwater and 3% hydrogen peroxide. (The mixture should have 2 or 3 times the amount of saltwater than hydrogen peroxide.) To make the saltwater mixture, put 1/4 teaspoon of salt in 1 cup of water. This helps clean wounds in the mouth. Rinse carefully so clots are not disturbed.

### Dry Mouth

#### Dry mouth (xerostomia) occurs when the salivary glands don't make enough saliva.

Saliva is made by salivary glands. Saliva is needed for taste, swallowing, and speech. It helps prevent infection and tooth decay by cleaning off the teeth and gums and preventing too much acid in the mouth.

Radiation therapy can damage salivary glands and cause them to make too little saliva. Some types of chemotherapy used for stem cell transplant may also damage salivary glands.

When there is not enough saliva, the mouth gets dry and uncomfortable. This condition is called dry mouth (xerostomia). The risk of tooth decay, gum disease, and infection increases, and your quality of life suffers.

Symptoms of dry mouth include the following:

- Thick, stringy saliva.
- Increased thirst.
- Changes in taste, swallowing, or speech.
- A sore or burning feeling (especially on the tongue).
- Cuts or cracks in the lips or at the corners of the mouth.
- Changes in the surface of the tongue.
- Problems wearing dentures.

#### Salivary glands usually return to normal after chemotherapy ends.

Dry mouth caused by chemotherapy for stem cell transplant is usually temporary. The salivary glands often recover 2 to 3 months after chemotherapy ends.

#### Salivary glands may not recover completely after radiation therapy ends.

The amount of saliva made by the salivary glands usually starts to decrease within 1 week after starting radiation therapy to the head or neck. It continues to decrease as treatment goes on. How severe the dryness is depends on the dose of radiation and the number of salivary glands that receive radiation.

Salivary glands may partly recover during the first year after radiation therapy. However, recovery is usually not complete, especially if the salivary glands received direct radiation. Salivary glands that did not receive radiation may start making more saliva to make up for the loss of saliva from the damaged glands.

#### Careful oral hygiene can help prevent mouth sores, gum disease, and tooth decay caused by dry mouth.

Care of dry mouth may include the following:

- Clean the mouth and teeth at least 4 times a day.
- Floss once a day.
- Brush with a fluoride toothpaste.
- Apply fluoride gel once a day at bedtime, after cleaning the teeth.
- Rinse 4 to 6 times a day with a mixture of salt and baking soda (mix ½ teaspoon salt and ½ teaspoon baking soda in 1 cup of warm water).
- Avoid foods and liquids that have a lot of sugar in them.
- Sip water often to relieve mouth dryness.

A dentist may give the following treatments:

- Rinses to replace minerals in the teeth.
- Rinses to fight infection in the mouth.
- Saliva substitutes or medicines that help the salivary glands make more saliva.
- Fluoride treatments to prevent tooth decay.

Acupuncture may also help relieve dry mouth.

### Tooth Decay

Dry mouth and changes in the balance of bacteria in the mouth increase the risk of tooth decay (cavities). Careful oral hygiene and regular care by a dentist can help prevent cavities. See the Regular Oral Care section of this summary for more information.

### Taste Changes

#### Changes in taste (dysguesia) are common during chemotherapy and radiation therapy.

Changes in the sense of taste is a common side effect of both chemotherapy and head or neck radiation therapy. Taste changes can be caused by damage to the taste buds, dry mouth, infection, or dental problems. Foods may seem to have no taste or may not taste the way they did before cancer treatment. Radiation may cause a change in sweet, sour, bitter, and salty tastes. Chemotherapy drugs may cause an unpleasant taste.

In most patients receiving chemotherapy and in some patients receiving radiation therapy, taste returns to normal a few months after treatment ends. However, for many radiation therapy patients, the change is permanent. In others, the taste buds may recover 6 to 8 weeks or more after radiation therapy ends. Zinc sulfate supplements may help some patients recover their sense of taste.

### Fatigue

Cancer patients who are receiving high-dose chemotherapy or radiation therapy often feel fatigue (a lack of energy). This can be caused by either the cancer or its treatment. Some patients may have problems sleeping. Patients may feel too tired for regular oral care, which may further increase the risk for mouth ulcers, infection, and pain. For more information, see Cancer Fatigue (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue).

### Malnutrition

#### Loss of appetite can lead to malnutrition.

Patients treated for head and neck cancers have a high risk of malnutrition. The cancer itself, poor diet before diagnosis, and complications from surgery, radiation therapy, and chemotherapy can lead to nutrition problems. Patients may lose the desire to eat because of nausea, vomiting, trouble swallowing, sores in the mouth, or dry mouth. When eating causes discomfort or pain, the patient's quality of life and nutritional well-being suffer. The following may help patients with cancer meet their nutrition needs:

- Serve food chopped, ground, or blended, to shorten the amount of time it needs to stay in the mouth before being swallowed.
- Eat between-meal snacks to add calories and nutrients.
- Eat foods high in calories and protein.
- Take supplements to get vitamins, minerals, and calories.

Meeting with a nutrition counselor may help during and after treatment.

#### Nutrition support may include liquid diets and tube feeding.

Many patients treated for head and neck cancers who receive radiation therapy only are able to eat soft foods. As treatment continues, most patients will add or switch to high-calorie, high-protein liquids to meet their nutrition needs. Some patients may need to receive the liquids through a tube that is inserted into the stomach or small intestine. Almost all patients who receive chemotherapy and head or neck radiation therapy at the same time will need tube feedings within 3 to 4 weeks. Studies show that patients do better if they begin these feedings at the start of treatment, before weight loss occurs.

Normal eating by mouth can begin again when treatment is finished and the area that received radiation is healed. A team that includes a speech and swallowing therapist can help the patients with the return to normal eating. Tube feedings are decreased as eating by mouth increases, and are stopped when you are able to get enough nutrients by mouth. Although most patients will once again be able to eat solid foods, many will have lasting complications such as taste changes, dry mouth, and trouble swallowing.

### Mouth and Jaw Stiffness

Treatment for head and neck cancers may affect the ability to move the jaws, mouth, neck, and tongue. There may be problems with swallowing. Stiffness may be caused by:

- Oral surgery.
- Late effects of radiation therapy. An overgrowth of fibrous tissue (fibrosis) in the skin, mucous membranes, muscle, and joints of the jaw may occur after radiation therapy has ended.
- Stress caused by the cancer and its treatment.

Jaw stiffness may lead to serious health problems, including:

- Malnutrition and weight loss from being unable to eat normally.
- Slower healing and recovery from poor nutrition.
- Dental problems from being unable to clean the teeth and gums well and have dental treatments.
- Weakened jaw muscles from not using them.
- Emotional problems from avoiding social contact with others because of trouble speaking and eating.

The risk of having jaw stiffness from radiation therapy increases with higher doses of radiation and with repeated radiation treatments. The stiffness usually begins around the time the radiation treatments end. It may get worse over time, stay the same, or get somewhat better on its own. Treatment should begin as soon as possible to keep the condition from getting worse or becoming permanent. Treatment may include the following

- Medical devices for the mouth.
- Pain treatments.
- Medicine to relax muscles.
- Jaw exercises.
- Medicine to treat depression.

### Swallowing Problems

#### Pain during swallowing and being unable to swallow (dysphagia) are common in cancer patients before, during, and after treatment.

Swallowing problems are common in patients who have head and neck cancers. Cancer treatment side effects such as oral mucositis, dry mouth, skin damage from radiation, infections, and graft-versus-host-disease (GVHD) may all cause problems with swallowing.

#### Trouble swallowing increases the risk of other complications.

Other complications can develop from being unable to swallow and these can further decrease the patient's quality of life:

- Pneumonia and other respiratory problems: Patients who have trouble swallowing may aspirate (inhale food or liquids into the lung) when trying to eat or drink. Aspiration can lead to serious conditions, including pneumonia and respiratory failure.
- Poor nutrition: Being unable to swallow normally makes it hard to eat well. Malnutrition occurs when the body doesn't get all the nutrients needed for health. Wounds heal slowly and the body is less able to fight off infections.
- Need for tube feeding: A patient who is not able to take in enough food by mouth may be fed through a tube. The health care team and a registered dietitian can explain the benefits and risks of tube feeding for patients who have swallowing problems.
- Side effects of pain medicine: Opioids used to treat painful swallowing may cause dry mouth and constipation.
- Emotional problems: Being unable to eat, drink, and speak normally may cause depression and the desire to avoid other people.

#### Whether radiation therapy will affect swallowing depends on several factors.

The following may affect the risk of swallowing problems after radiation therapy:

- Total dose and schedule of radiation therapy. Higher doses over a shorter time often have more side effects.
- The way the radiation is given. Some types of radiation cause less damage to healthy tissue.
- Whether chemotherapy is given at the same time. The risk of side effects is increased if both are given.
- The patient's genetic makeup.
- Whether the patient is taking any food by mouth or only by tube feeding.
- Whether the patient smokes.
- How well the patient copes with problems.

#### Swallowing problems sometimes go away after treatment

Some side effects go away within 3 months after the end of treatment, and patients are able to swallow normally again. However, some treatments can cause permanent damage or late effects. Late effects are health problems that occur long after treatment has ended. Conditions that may cause permanent swallowing problems or late effects include:

- Damaged blood vessels.
- Wasting away of tissue in the treated areas.
- Lymphedema (buildup of lymph in the body).
- Overgrowth of fibrous tissue in head or neck areas, which may lead to jaw stiffness.
- Chronic dry mouth.
- Infections.

#### Swallowing problems are managed by a team of experts.

The oncologist works with other health care experts who specialize in treating head and neck cancers and the oral complications of cancer treatment. These specialists may include the following:

- Speech therapist: A speech therapist can assess how well the patient is swallowing and give the patient swallowing therapy and information to better understand the problem.
- Dietitian: A dietitian can help plan a safe way for the patient to receive the nutrition needed for health while swallowing is a problem.
- Dental specialist: Replace missing teeth and damaged area of the mouth with artificial devices to help swallowing.
- Psychologist: For patients who are having a hard time adjusting to being unable to swallow and eat normally, psychological counseling may help.

### Tissue and Bone Loss

Radiation therapy can destroy very small blood vessels within the bone. This can kill bone tissue and lead to bone fractures or infection. Radiation can also kill tissue in the mouth. Ulcers may form, grow, and cause pain, loss of feeling, or infection.

Preventive care can make tissue and bone loss less severe.

The following may help prevent and treat tissue and bone loss:

- Eat a well-balanced diet.
- Wear removable dentures or devices as little as possible.
- Don't smoke.
- Don't drink alcohol.
- Use topical antibiotics.
- Use painkillers as prescribed.
- Surgery to remove dead bone or to rebuild bones of the mouth and jaw.
- Hyperbaric oxygen therapy (a method that uses oxygen under pressure to help wounds heal).

For more information about managing mouth sores, dry mouth, and taste changes, see Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition).

## Managing Oral Complications of High-Dose Chemotherapy and/or Stem Cell Transplant

Key Points for This Section
- Patients who receive transplants have an increased risk of graft-versus-host disease.
- Oral devices need special care during high-dose chemotherapy and/or stem cell transplant.
- Care of the teeth and gums is important during chemotherapy or stem cell transplant.
- Medicines and ice may be used to prevent and treat mucositis from stem cell transplant.
- Dental treatments may be put off until the patient's immune system returns to normal.

### Patients who receive transplants have an increased risk of graft-versus-host disease.

Graft-versus-host disease (GVHD) occurs when your tissue reacts to bone marrow or stem cells that come from a donor. Symptoms of oral GVHD include the following:

- Sores that are red and have ulcers, which appear in the mouth 2 to 3 weeks after the transplant.
- Dry mouth.
- Pain from spices, alcohol, or flavoring (such as mint in toothpaste).
- Swallowing problems.
- A feeling of tightness in the skin or in the lining of the mouth.
- Taste changes.

It's important to have these symptoms treated because they can lead to weight loss or malnutrition. Treatment of oral GVHD may include the following:

- Topical rinses, gels, creams, or powders.
- Antifungal drugs taken by mouth or injection.
- Psoralen and ultraviolet A (PUVA) therapy.
- Drugs that help the salivary glands make more saliva.
- Fluoride treatments.
- Treatments to replace minerals lost from teeth by acids in the mouth.

### Oral devices need special care during high-dose chemotherapy and/or stem cell transplant.

The following can help in the care and use of dentures, braces, and other oral devices during high-dose chemotherapy or stem cell transplant:

- Have brackets, wires, and retainers removed before high-dose chemotherapy begins.
- Wear dentures only when eating during the first 3 to 4 weeks after the transplant.
- Brush dentures twice a day and rinsing them well.
- Soak dentures in an antibacterial solution when they are not being worn.
- Clean denture soaking cups and changing denture soaking solution every day.
- Remove dentures or other oral devices when cleaning your mouth.
- Continue your regular oral care 3 or 4 times a day with dentures or other devices out of the mouth.
- If you have mouth sores, avoid using removable oral devices until the sores have healed.

### Care of the teeth and gums is important during chemotherapy or stem cell transplant.

Talk to your medical doctor or dentist about the best way to take care of your mouth during high-dose chemotherapy and stem cell transplant. Careful brushing and flossing may help prevent infection of oral tissues. The following may help prevent infection and relieve discomfort of oral in tissues:

- Brush teeth with a soft-bristle brush 2 to 3 times a day. Be sure to brush the area where the teeth meet the gums.
- Rinse the toothbrush in hot water every 15 to 30 seconds to keep the bristles soft.
- Rinse your mouth 3 or 4 times while brushing.
- Avoid rinses that have alcohol in them.
- Use a mild-tasting toothpaste.
- Let the toothbrush air-dry between uses.
- Floss according to your medical doctor's or dentist's directions.
- Clean the mouth after meals.
- Use foam swabs to clean the tongue and roof of the mouth.
- Avoid the following:
  - Foods that are spicy or acidic.
  - "Hard" foods that could irritate or break the skin in your mouth, such as chips.
  - Hot foods and drinks.

### Medicines and ice may be used to prevent and treat mucositis from stem cell transplant.

Medicines may be given to help prevent mouth sores or help the mouth heal faster if it is damaged by chemotherapy or radiation therapy. Also, holding ice chips in the mouth during high-dose chemotherapy, may help prevent mouth sores.

### Dental treatments may be put off until the patient's immune system returns to normal.

Regular dental treatments, including cleaning and polishing, should wait until the transplant patient's immune system returns to normal. The immune system can take 6 to 12 months to recover after high-dose chemotherapy and stem cell transplant. During this time, the risk of oral complications is high. If dental treatments are needed, antibiotics and supportive care are given.

Supportive care before oral procedures may include giving antibiotics or immunoglobulin G, adjusting steroid doses, and/or platelet transfusion.

## Oral Complications in Second Cancers

Cancer survivors who received chemotherapy or a transplant or who underwent radiation therapy are at risk of developing a second cancer later in life. Oral squamous cell cancer is the most common second oral cancer in transplant patients. The lips and tongue are the areas that are affected most often.

Second cancers are more common in patients treated for leukemia or lymphoma, Multiple myeloma patients who received a stem cell transplant using their own stem cells sometimes develop an oral plasmacytoma.

Patients who received a transplant should see a doctor if they have swollen lymph nodes or lumps in soft tissue areas. This could be a sign of a second cancer.

## Oral Complications Not Related to Chemotherapy or Radiation Therapy

Key Points for This Section
- Certain drugs used to treat cancer and other bone problems are linked to bone loss in the mouth.
- Treatment of ONJ usually includes treating the infection and good dental hygiene.

### Certain drugs used to treat cancer and other bone problems are linked to bone loss in the mouth.

Some drugs break down bone tissue in the mouth. This is called osteonecrosis of the jaw (ONJ). ONJ can also cause infection. Symptoms include pain and inflamed lesions in the mouth, where areas of damaged bone may show.

Drugs that may cause ONJ include the following:

- Bisphosphonates: Drugs given to some patients whose cancer has spread to the bones. They are used to decrease pain and the risk of broken bones. Bisphosphonates are also used to treat hypercalcemia (too much calcium in the blood). Bisphosphonates commonly used include zoledronic acid, pamidronate, and alendronate.
- Denosumab: A drug used to prevent or treat certain bone problems. Denosumab is a type of monoclonal antibody.
- Angiogenesis inhibitors: Drugs or substances that keep new blood vessels from forming. In cancer treatment, angiogenesis inhibitors may prevent the growth of new blood vessels that tumors need to grow. Some of the angiogenesis inhibitors that may cause ONJ are bevacizumab, sunitinib, and sorafenib.

It's important for the health care team to know if a patient has been treated with these drugs. Cancer that has spread to the jawbone can look like ONJ. A biopsy may be needed to find out the cause of the ONJ.

ONJ is not a common condition. It occurs more often in patients who receive bisphosphonates or denosumab by injection than in patients who take them by mouth. Taking bisphosphonates, denosumab, or angiogenesis inhibitors increases the risk of ONJ. The risk of ONJ is much greater when angiogenesis inhibitors and bisphosphonates are used together.

The following may also increase the risk of ONJ:

- Having teeth removed.
- Wearing dentures that do not fit well.
- Having multiple myeloma.

Patients with bone metastases may decrease their risk of ONJ by getting screened and treated for dental problems before bisphosphonate or denosumab therapy is started.

### Treatment of ONJ usually includes treating the infection and good dental hygiene.

Treatment of ONJ may include the following:

- Removing the infected tissue, which may include bone. Laser surgery may be used.
- Smoothing sharp edges of exposed bone.
- Using antibiotics to fight infection.
- Using medicated mouth rinses.
- Using pain medicine.

During treatment for ONJ, you should continue to brush and floss after meals to keep your mouth very clean. It is best to avoid tobacco use while ONJ is healing.

You and your doctor can decide whether you should stop using medicines that cause ONJ, based on the effect it would have on your general health.

## Oral Complications and Social Problems

The social problems related to oral complications can be the hardest problems for cancer patients to cope with. Oral complications affect eating and speaking and may make you unable or unwilling to take part in mealtimes or to dine out. Patients may become frustrated, withdrawn, or depressed, and they may avoid other people. Some drugs that are used to treat depression cannot be used because they can make oral complications worse. See the following PDQ summaries for more information:

- Adjustment to Cancer: Anxiety and Distress
- Depression

Education, supportive care, and the treatment of symptoms are important for patients who have mouth problems that are related to cancer treatment. Patients are watched closely for pain, ability to cope, and response to treatment. Supportive care from health care providers and family can help the patient cope with cancer and its complications.

## Oral Complications of Chemotherapy and Radiation Therapy in Children

Children who received high-dose chemotherapy or radiation therapy to the head and neck may not have normal dental growth and development. New teeth may appear late or not at all, and tooth size may be smaller than normal. The head and face may not develop fully. The changes are usually the same on both sides of the head and are not always noticeable.

Orthodontic treatment for patients with these dental growth and development side effects is being studied.

## Changes to This Summary (10/15/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the causes and treatment of oral complications of cancer therapies. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Oral Complications of Cancer Therapies. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat/oral-complications-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389169]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).